# Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Screening (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about ovarian, fallopian tube, and primary peritoneal cancers screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries containing information related to ovarian, fallopian tube, and primary peritoneal cancers screening include the following:

- Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Prevention
- Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancer Treatment
- Ovarian Germ Cell Tumors Treatment
- Ovarian Borderline Tumors Treatment

### Evidence of Lack of Mortality Benefit Associated With Screening

#### Single-threshold cancer antigen 125 (CA-125) levels and transvaginal ultrasound (TVU)

There is solid evidence to indicate that screening women aged 55 to 74 years at average risk of developing ovarian cancer with the serum marker CA-125 (at a fixed threshold for a positive result of 35 U/mL) annually for 6 years and TVU for 4 years does not result in a decrease in ovarian cancer mortality, after a median follow-up of 17 years.

Magnitude of Effect: The ovarian cancer mortality rate was 4.4 deaths per 10,000 person-years in the intervention arm and 3.8 deaths per 10,000 person-years in the usual-care arms, respectively (rate ratio, 1.18; 95% confidence interval [CI], 0.98–1.4).[1]

- Study Design: Evidence obtained from one randomized controlled trial.
- Internal Validity: Good.
- Consistency: One trial has evaluated the impact on mortality from ovarian cancer.
- External Validity: Good.

#### Screening with TVU alone or with multimodal screening with CA-125 levels, assessed using the Risk of Ovarian Cancer Algorithm (ROCA), with TVU

Screening with TVU alone or with multimodal screening with CA-125 levels, assessed using the ROCA, combined with TVU in the United Kingdom Collaborative Trial of Ovarian Cancer Screening (UKCTOCS) did not show a mortality benefit of screening with either approach based on a predetermined primary endpoint among women undergoing 7 to 11 screens and a median of 16.3 years of follow-up.[2]

Magnitude of Effect: Multimodal screening was associated with no significant difference in mortality compared with no screening (hazard ratio [HR], 0.94; 95% CI, 0.83–1.08). Ultrasound only screening also resulted in no significant difference in mortality compared with no screening (HR, 0.94; 95% CI, 0.82–1.08).[2] Screening complications were less than 1% for both TVU only and multimodality screening strategies.[3]

- Study Design: Evidence obtained from one randomized controlled trial.
- Internal Validity: Good.
- Consistency: One trial has evaluated the impact on mortality from ovarian cancer using this specific approach.
- External Validity: Good—based on data from other studies assessing complementary endpoints.

#### Statement of harms

Based on solid evidence, screening for ovarian cancer results in false-positive test results. Screened women had higher rates of oophorectomy and other minor complications such as fainting and bruising.

Magnitude of Effect:

- Of screened women, 9.6% had false-positive results, resulting in 6.2% undergoing surgery. The surgical complication rate was 1.2% for all screened women.
- Oophorectomy rates were 85.7 per 10,000 person-years among screened women and 64.2 per 10,000 person-years among usual-care women.
- Minor complications with screening: 58.3 cases per 10,000 women screened with CA-125 and 3.3 cases per 10,000 women screened with transvaginal sonogram.
- Study Design: Evidence obtained from one randomized controlled trial.
- Internal Validity: Good.
- Consistency: Not applicable.
- External Validity: Good.

In the TVU-only arm of the UKCTOCS, there were 50 false-positive surgical procedures, and in the multimodality arm, there were 14 false-positive operations per 10,000 screens.[3]

In the general population, screening is targeted to postmenopausal women, and the major complications are related to surgery. Among younger women, the potential target group among BRCA1/2 mutation carriers, oophorectomy at younger than 45 years may increase mortality secondary to cardiovascular disease. Oophorectomy, if performed among younger women, may also reduce risk of estrogen receptor–positive breast cancers, which occur with elevated frequency among carriers of BRCA2 mutations.

### References

Pinsky PF, Miller EA, Zhu CS, et al.: Overall mortality in men and women in the randomized Prostate, Lung, Colorectal, and Ovarian Cancer Screening Trial. J Med Screen 26 (3): 127-134, 2019.30943843
Menon U, Gentry-Maharaj A, Burnell M, et al.: Ovarian cancer population screening and mortality after long-term follow-up in the UK Collaborative Trial of Ovarian Cancer Screening (UKCTOCS): a randomised controlled trial. Lancet 397 (10290): 2182-2193, 2021.33991479
Jacobs IJ, Menon U, Ryan A, et al.: Ovarian cancer screening and mortality in the UK Collaborative Trial of Ovarian Cancer Screening (UKCTOCS): a randomised controlled trial. Lancet 387 (10022): 945-56, 2016.26707054

## Incidence and Mortality

Ovarian cancer is rare; the lifetime risk of being diagnosed with ovarian cancer is 1.12%.[1]

Ovarian carcinoma is the sixth-leading cause of cancer death among women in the United States and has the highest mortality rate of all gynecologic cancers. It is estimated that 20,890 new cases of ovarian cancer will be diagnosed in the United States in 2025, and 12,730 women will die of this disease. Ovarian cancer incidence rates have been declining since at least the 1970s and have decreased by 1.6% per year from 2012 to 2021. Ovarian cancer mortality rates decreased by 2.4% per year from 2004 to 2022.[2] The prognosis for survival from ovarian carcinoma largely depends on stage, which is strongly associated with histopathological type. Approximately 70% of women with ovarian carcinoma have high-grade serous carcinoma, which is usually diagnosed at an advanced stage, leading to poor survival.[3]

### References

Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Koshiyama M, Matsumura N, Konishi I: Subtypes of Ovarian Cancer and Ovarian Cancer Screening. Diagnostics (Basel) 7 (1): , 2017.28257098

## Types of Ovarian, Fallopian Tube, and Primary Peritoneal Cancers

The term ovarian cancer encompasses a heterogeneous group of malignant tumors of ovarian origin that may arise from germ cells, stromal tissue, or epithelial tissue within the ovary. Epithelial cancers are the most common type of ovarian cancer and are further classified into five main types: high-grade serous, endometrioid, clear cell, mucinous, and low-grade serous carcinomas.[1] Data from detailed pathology reviews of specimens removed during risk-reducing surgery from carriers of BRCA1/BRCA2 mutations have demonstrated a putative precursor of high-grade serous carcinoma in the fimbria of the fallopian tube (serous tubal intraepithelial carcinoma [STIC]), suggesting that many carcinomas in this group previously classified as ovarian are actually tubal primary tumors. Similar lesions have been found in noncarriers of BRCA1/2 mutations, but most data from this group are limited by the presence of concurrent bulky carcinomas throughout the pelvis. STIC is not found in all cases of high-grade serous carcinoma, suggesting other possible origins of these tumors. Many endometrioid and clear cell carcinomas are postulated to arise from endometriosis, a benign lesion that may result from implantation and persistence of exfoliated menstrual endometrium.

Malignant germ cell tumors and stromal tumors such as granulosa cell tumors are rare and account for 10% or less of malignant ovarian tumors.[2]

### References

Prat J: Ovarian carcinomas: five distinct diseases with different origins, genetic alterations, and clinicopathological features. Virchows Arch 460 (3): 237-49, 2012.22322322
Cramer DW: The epidemiology of endometrial and ovarian cancer. Hematol Oncol Clin North Am 26 (1): 1-12, 2012.22244658

## Risk Factors

For a complete description of factors associated with an increased or decreased risk of ovarian cancer, see the Factors With Adequate Evidence of an Increased Risk of Ovarian, Fallopian Tube, and Primary Peritoneal Cancers section in Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Prevention. Several cancer family syndromes, such as BRCA1 and BRCA2 hereditary breast-ovarian syndrome and Lynch syndrome are associated with a marked increased risk of ovarian cancer.[1,2] For more information about these syndromes and other genetic risk factors for ovarian cancer, see the Autosomal Dominant Inheritance of Breast and Gynecologic Cancer Predisposition section in Genetics of Breast and Gynecologic Cancers.

### References

Hunn J, Rodriguez GC: Ovarian cancer: etiology, risk factors, and epidemiology. Clin Obstet Gynecol 55 (1): 3-23, 2012.22343225
Cramer DW: The epidemiology of endometrial and ovarian cancer. Hematol Oncol Clin North Am 26 (1): 1-12, 2012.22244658

## Evidence of Lack of Mortality Benefit Associated With Different Screening Modalities

Ovarian cancer often presents with persistent but vague symptoms, usually occurring after the cancer has metastasized. Some investigators have proposed the use of symptom indices as a method of screening for ovarian cancer.[1,2] Because this is not, by definition, asymptomatic screening, it is not considered further in this summary.

Gynecologic examination usually includes a manual pelvic examination, but this procedure is commonly viewed as lacking sensitivity for detection of early-stage disease.[3,4] There is no evidence of the benefit of this test for the early detection of and decreased mortality from ovarian cancer, so it is not further considered.

Other screening tests include transvaginal ultrasound (TVU) and the serum cancer antigen 125 (CA-125) assay. These tests are often performed in combination. Several biomarkers with potential application to ovarian cancer screening are under development but have not yet been validated or evaluated for efficacy in early detection and mortality reduction.

A U.S. Food and Drug Administration Safety Communication issued in September 2016 recommends against using currently offered screening tests to screen for ovarian cancer in any population of women. Asymptomatic high-risk women who have a false-negative screening test may delay effective preventive treatments.

### The United Kingdom Collaborative Trial of Ovarian Cancer Screening (UKCTOCS)

TVU (or transvaginal sonogram [TVS]) has been proposed as a screening method for ovarian cancer because of its ability to reliably measure ovarian size and detect small masses.[5]

In the UKCTOCS, outcomes among 50,623 postmenopausal women aged 50 to 74 years who were randomly assigned to 7 to 11 rounds of annual screening with TVU alone and 50,625 who underwent multimodal screening with CA-125 testing and TVU (see below) were compared with results from a comparison group of 101,299 women who were not screened. Women were recruited in 13 trial centers across the United Kingdom from 2001 to 2005. After trial initiation, but before analysis, the protocol was amended twice: 1) the study was extended to achieve greater power and 2) criteria for referral in the multimodal arm were liberalized to increase the percentage of positive screens.[6] Because the number of events were less than anticipated on the planned censorship date, the authors extended the follow-up period. No formal adjustments were made to account for the previously analyzed data in 2015, rather the authors acknowledged the P values were not adjusted for multiplicity. Additionally, the authors changed the statistical analysis plan for the extended follow-up analysis from a Cox version of the log-rank test to the versatile test in efforts to be sensitive to delayed mortality effects in screening trials.[7]

TVUs were scored as normal, resulting in continued annual screening; intermediate, leading to repeat CA-125 and TVU at 3 months; or abnormal, requiring repeat testing within 6 weeks. In the TVU arm, 445 cancers were diagnosed and 291 ovarian cancer–related deaths occurred compared with the nonscreened arm, in which 905 cancers were diagnosed and 619 ovarian cancer–related deaths occurred. TVU screening resulted in 50 surgeries per 10,000 women for a false-positive screen. Complications occurred in less than 1% of screening examinations and 3.4% of surgeries. Over a median of 16.3 years, ovarian cancer deaths occurred among 0.6% of screened women and 0.6% of unscreened women.[6-8]

### CA-125 Serum Testing for Ovarian Cancer Screening

CA-125 is a tumor-associated antigen that is used clinically to monitor patients with epithelial ovarian carcinomas.[9,10] Measurement of CA-125 concentrations has been proposed as a potential marker for the early detection of ovarian cancer, either as a single test with a threshold cutpoint or in algorithms examining the change in levels over time. The two randomized trials have included CA-125 either in parallel or sequentially with TVU for multimodality screening. The most commonly reported CA-125 reference value that designates a positive screening test is 35 U/mL; this was the reference value used in the Prostate, Lung, Colorectal, and Ovarian (PLCO) Screening Trial (NCT01696994 (https://www.cancer.gov/clinicaltrials/NCT01696994)) to define an abnormal test result. The measurement of CA-125 levels, in parallel combination with TVU,[11] is the ovarian screening intervention evaluated in the PLCO trial.[12,13] Elevated CA-125 levels are not specific to ovarian cancer and have been observed in patients with nongynecological cancers,[10] endometriosis,[14] liver disease, congestive heart failure, pleural or peritoneal fluid accumulation, and in the first trimester of pregnancy.[15,16] The sensitivity of the CA-125 test for the detection of ovarian cancer was estimated in two nested case-control studies using serum banks.[17,18] The sensitivity for CA-125 levels of at least 35 U/mL ranged from 20% to 57% for cases occurring within the first 3 years of follow-up; the specificity was 95%.

A phase II/III biomarker study was conducted to evaluate the sensitivity of several markers of ovarian cancer, including CA-125 concentrations, using specimens collected from ovarian cancer patients at four sites. The estimated sensitivity for early-stage disease (stage I and II ovarian cancer) was 56% (95% CI, 49%–72%) for a cutpoint set to obtain a fixed specificity of 95%. The threshold for the cutpoint for CA-125 at 95% specificity was 24 U/mL. For all cases (56% of cases had stage III or IV disease at diagnosis), the sensitivity was 73% (95% CI, 64%–84%). When the clinical cutpoint of 35 U/mL was used, the sensitivity decreased.[19]

### The Prostate, Lung, Colorectal, and Ovarian (PLCO) Cancer Screening Trial: Single-Threshold CA-125 Levels and TVU

The PLCO trial evaluated the effect of screening on ovarian cancer mortality among women aged 55 to 74 years on the basis of six annual screens with serum CA-125 testing at a threshold for positive of 35 U/mL and four annual screens with TVU. Women were randomly assigned to screening (n = 39,105) or usual care (n = 39,111) at ten screening centers across the United States between November 1993 and July 2001. Participants and their health care practitioners received the screening test results and managed evaluation of abnormal results. The usual-care group was not offered screening with CA-125 or TVU but received their usual medical care. Participants were initially monitored for a maximum of 13 years (median, 12.4 years; range, 10.9–13.0 years) for cancer diagnoses and death until February 28, 2010. Mortality from ovarian cancer, including primary peritoneal and fallopian tube cancers, was the main outcome measure. Secondary outcomes included ovarian cancer incidence and complications associated with screening examinations and diagnostic procedures.[20] After transition of PLCO trial participants to a centralized follow-up process, follow-up for mortality was extended until the end of 2012, for a maximum of 19.2 years and a median of 14.7 years.[21]

Compliance with screening ranged from 85% at the initial round to 73% at the sixth round, while contamination in the usual-care group ranged from about 3.0% for CA-125 to 4.6% for TVU. Across the first four screening rounds, 11.1% of women had at least one positive test, 8.1% had at least one positive TVU, and 3.4% had at least one positive CA-125 test. The yields of both tests were similar. Ovarian cancer was diagnosed in 212 women (5.7 per 10,000 person-years) in the intervention group and 176 women (4.7 per 10,000 person-years) in the usual-care group (rate ratio, 1.21; 95% CI, 0.99–1.48). The stage distributions were similar by study group, with stage III and IV cancers comprising most cases in both the intervention group (163 cases, 77%) and the usual-care group (137 cases, 78%). The cancer case treatment distributions were very similar between groups within each stage. Through the original period of follow-up (maximum, 13 years), ovarian cancer caused 118 deaths (3.1 per 10,000 person-years) in the intervention group and 100 deaths (2.6 per 10,000 person-years) in the usual-care group (mortality rate ratio, 1.18; 95% CI, 0.82–1.71). Long-term follow-up of a median of 17 years for women with at least one ovary demonstrated an ovarian cancer mortality rate of 4.4 deaths per 10,000 person-years (246 ovarian cancer deaths) in the intervention arm and 3.8 deaths per 10,000 person-years (209 ovarian cancer deaths) in the usual-care arm (rate ratio, 1.18; 95% CI, 0.98–1.4).[22]

Of the 3,285 women with false-positive results, 1,080 underwent surgical follow-up. Of the 1,080 women who underwent surgical follow-up, 163 women experienced at least one serious complication (15%). A total of 1,771 women in the intervention group (7.7%) and 1,304 in the usual-care group (5.8%) reported oophorectomy. There were 2,924 deaths resulting from other causes (excluding ovarian, colorectal, and lung cancer) (76.6 per 10,000 person-years) in the intervention group and 2,914 such deaths (76.2 per 10,000 person-years) in the usual-care group (rate ratio, 1.01; 95% CI, 0.96–1.06).[20,23]

In the PLCO trial, women with visualized ovaries were at slightly higher risk of ovarian cancer (hazard ratio, 1.42; 95% CI, 1.00–2.01) than were women who had nonvisualized ovaries.[24] A nested analysis found that ovarian volume increases were detectable 1 to 2 years before diagnosis, but the magnitude of change did not appear translatable to clinical management. Thus, among women in the general U.S. population, simultaneous screening with CA-125 and TVU did not reduce ovarian cancer mortality when compared with usual care.[20]

The Shizuoka Cohort Study of Ovarian Cancer Screening randomly assigned women to either a screening group (n = 41,668) or a control group (n = 40,799) between 1985 and 1999 at 212 hospitals in the Shizuoka prefecture of Japan. The screening protocol comprised ultrasound and CA-125 tests annually. Women with abnormal findings were referred to a gynecological oncologist. Ovarian cancer diagnoses were determined by record linkage to the Shizuoka Cancer Registry in 2002. The annual death certificate file in Shizuoka was checked to ascertain vital status. The mean follow-up time was 9.2 years, and the mean number of screens per woman was 5.4. There were 35 ovarian cancers detected in the screening group and 32 in the control group, with a nonstatistically significant difference in the stage distribution. Nine percent of regular screening attendees had at least one false-positive result.[25] Mortality results from this trial are not available.

### Ovarian Cancer Screening Using CA-125 Analyzed According to the Risk of Ovarian Cancer Algorithm (ROCA) for a Positive Test Result in Combination With TVU

The UKCTOCS trial evaluated longitudinal CA-125 measurements using the ROCA, which defines a positive test as a statistically significant increase in a woman’s serial measurements based on the algorithm, irrespective of the absolute level. The goal of this approach is to detect cancers earlier by identifying subtle within-person changes. The UKCTOCS multimodal screen incorporated a two-stage approach with ROCA as the primary screen and TVS as a secondary screen (based on results of the ROCA) for its impact on ovarian cancer mortality compared with observation without screening. Of 50,078 women in the multimodality screening arm, 452 women were diagnosed with ovarian cancer and 296 died of the disease. In this arm, less than 1% of screens led to complications, and 3.1% of women developed surgical complications. Using multimodal screening, 14 per 10,000 screens led to surgery for a false-positive result.

There was a 39.2% (95% CI, 16.1–66.9) higher incidence of stage I or II disease and a 10.2% (95% CI, -21.3 to 2.4) lower incidence of stage III and IV disease in the multimodality screening arm compared with the no screening arm. However, despite the stage shift, at a median follow-up of 16.3 years, there was no significant difference in mortality, with 0.6% deaths in the multimodality screening arm compared with 0.6% in the observation arm.[7]

A post hoc nested study was conducted within the PLCO trial to determine if the use of ROCA could potentially improve the identification of early-stage (stage I and stage II) ovarian cancer.[26] The study evaluated the potential impact under two scenarios: best case and stage shift. Best-case scenario assumed that all cancers that would have been detected earlier with ROCA than with single-threshold CA-125 concentrations would have avoided mortality. The stage-shift scenario applied the observed PLCO early-stage survival rates to cases detected at an earlier stage with ROCA. The risk of death from ovarian cancer with ROCA was lower, but estimates were not statistically significant (relative risk [RR] of 0.90 for best-case scenario [95% CI, 0.69–1.17] and RR of 0.95 for stage-shift scenario [95% CI, 0.74–1.23]).

Another retrospective study using annual CA-125 concentrations from the PLCO trial examined the potential impact of parametric empirical Bayes (PEB) longitudinal algorithm for the earlier detection of 44 incident ovarian cancers identified in the PLCO trial. Setting the specificity at 99%, PEB signaled “abnormal” CA-125 concentrations, on average, 10 months earlier than with the single-threshold cutpoint.[27] An analysis of serial CA-125 concentrations from the UKCTOCS trial demonstrated superior performance characteristics for ovarian cancer screening using longitudinal algorithms, compared with a single CA-125 threshold.[28] Whether either of these approaches translates into a mortality benefit could not be determined.

CA-125 velocity has also been examined using a multiple logistic regression model within the PLCO trial as a predictor for the development of ovarian cancer.[29] Both CA-125 velocity and time intervals between screening tests were associated with the development of ovarian cancer. The risk of ovarian cancer increased as velocity (measured as U/mL per month) increased, and the risk of ovarian cancer decreased when the time intervals between screening tests increased.

### References

Goff BA, Mandel LS, Melancon CH, et al.: Frequency of symptoms of ovarian cancer in women presenting to primary care clinics. JAMA 291 (22): 2705-12, 2004.15187051
Lim AW, Mesher D, Gentry-Maharaj A, et al.: Predictive value of symptoms for ovarian cancer: comparison of symptoms reported by questionnaire, interview, and general practitioner notes. J Natl Cancer Inst 104 (2): 114-24, 2012.22247022
Smith LH, Oi RH: Detection of malignant ovarian neoplasms: a review of the literature. I. Detection of the patient at risk; clinical, radiological and cytological detection. Obstet Gynecol Surv 39 (6): 313-28, 1984.6374536 84220605
Hall DJ, Hurt WG: The adnexal mass. J Fam Pract 14 (1): 135-40, 1982.7054360 82099964
Higgins RV, van Nagell JR, Woods CH, et al.: Interobserver variation in ovarian measurements using transvaginal sonography. Gynecol Oncol 39 (1): 69-71, 1990.2227575 91033235
Jacobs IJ, Menon U, Ryan A, et al.: Ovarian cancer screening and mortality in the UK Collaborative Trial of Ovarian Cancer Screening (UKCTOCS): a randomised controlled trial. Lancet 387 (10022): 945-56, 2016.26707054
Menon U, Gentry-Maharaj A, Burnell M, et al.: Ovarian cancer population screening and mortality after long-term follow-up in the UK Collaborative Trial of Ovarian Cancer Screening (UKCTOCS): a randomised controlled trial. Lancet 397 (10290): 2182-2193, 2021.33991479
Sharma A, Apostolidou S, Burnell M, et al.: Risk of epithelial ovarian cancer in asymptomatic women with ultrasound-detected ovarian masses: a prospective cohort study within the UK collaborative trial of ovarian cancer screening (UKCTOCS). Ultrasound Obstet Gynecol 40 (3): 338-44, 2012.22911637
Bast RC, Feeney M, Lazarus H, et al.: Reactivity of a monoclonal antibody with human ovarian carcinoma. J Clin Invest 68 (5): 1331-7, 1981.7028788 82053487
Bast RC, Klug TL, St John E, et al.: A radioimmunoassay using a monoclonal antibody to monitor the course of epithelial ovarian cancer. N Engl J Med 309 (15): 883-7, 1983.6310399 83297582
Jacobs I, Stabile I, Bridges J, et al.: Multimodal approach to screening for ovarian cancer. Lancet 1 (8580): 268-71, 1988.2893084 88120770
Buys SS, Partridge E, Greene MH, et al.: Ovarian cancer screening in the Prostate, Lung, Colorectal and Ovarian (PLCO) cancer screening trial: findings from the initial screen of a randomized trial. Am J Obstet Gynecol 193 (5): 1630-9, 2005.16260202
Gohagan JK, Levin DL, Prorok JC, et al., eds.: The Prostate, Lung, Colorectal and Ovarian (PLCO) cancer screening trial. Control Clin Trials 21(6 suppl): 249S-406S, 2000.
Jacobs I, Bast RC: The CA 125 tumour-associated antigen: a review of the literature. Hum Reprod 4 (1): 1-12, 1989.2651469 89214629
Niloff JM, Knapp RC, Schaetzl E, et al.: CA125 antigen levels in obstetric and gynecologic patients. Obstet Gynecol 64 (5): 703-7, 1984.6208522 85037361
Haga Y, Sakamoto K, Egami H, et al.: Evaluation of serum CA125 values in healthy individuals and pregnant women. Am J Med Sci 292 (1): 25-9, 1986.3521278 86239321
Zurawski VR, Orjaseter H, Andersen A, et al.: Elevated serum CA 125 levels prior to diagnosis of ovarian neoplasia: relevance for early detection of ovarian cancer. Int J Cancer 42 (5): 677-80, 1988.3182103 89032678
Helzlsouer KJ, Bush TL, Alberg AJ, et al.: Prospective study of serum CA-125 levels as markers of ovarian cancer. JAMA 269 (9): 1123-6, 1993.8433467 93164366
Cramer DW, Bast RC, Berg CD, et al.: Ovarian cancer biomarker performance in prostate, lung, colorectal, and ovarian cancer screening trial specimens. Cancer Prev Res (Phila) 4 (3): 365-74, 2011.21372036
Buys SS, Partridge E, Black A, et al.: Effect of screening on ovarian cancer mortality: the Prostate, Lung, Colorectal and Ovarian (PLCO) Cancer Screening Randomized Controlled Trial. JAMA 305 (22): 2295-303, 2011.21642681
Pinsky PF, Yu K, Kramer BS, et al.: Extended mortality results for ovarian cancer screening in the PLCO trial with median 15years follow-up. Gynecol Oncol 143 (2): 270-275, 2016.27615399
Pinsky PF, Miller EA, Zhu CS, et al.: Overall mortality in men and women in the randomized Prostate, Lung, Colorectal, and Ovarian Cancer Screening Trial. J Med Screen 26 (3): 127-134, 2019.30943843
Partridge E, Kreimer AR, Greenlee RT, et al.: Results from four rounds of ovarian cancer screening in a randomized trial. Obstet Gynecol 113 (4): 775-82, 2009.19305319
Bodelon C, Pfeiffer RM, Buys SS, et al.: Analysis of serial ovarian volume measurements and incidence of ovarian cancer: implications for pathogenesis. J Natl Cancer Inst 106 (10): , 2014.25217774
Kobayashi H, Yamada Y, Sado T, et al.: A randomized study of screening for ovarian cancer: a multicenter study in Japan. Int J Gynecol Cancer 18 (3): 414-20, 2008 May-Jun.17645503
Pinsky PF, Zhu C, Skates SJ, et al.: Potential effect of the risk of ovarian cancer algorithm (ROCA) on the mortality outcome of the Prostate, Lung, Colorectal and Ovarian (PLCO) trial. Int J Cancer 132 (9): 2127-33, 2013.23065684
Drescher CW, Shah C, Thorpe J, et al.: Longitudinal screening algorithm that incorporates change over time in CA125 levels identifies ovarian cancer earlier than a single-threshold rule. J Clin Oncol 31 (3): 387-92, 2013.23248253
Blyuss O, Burnell M, Ryan A, et al.: Comparison of Longitudinal CA125 Algorithms as a First-Line Screen for Ovarian Cancer in the General Population. Clin Cancer Res 24 (19): 4726-4733, 2018.30084833
Xu JL, Commins J, Partridge E, et al.: Longitudinal evaluation of CA-125 velocity and prediction of ovarian cancer. Gynecol Oncol 125 (1): 70-4, 2012.22198243

## Latest Updates to This Summary (04/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 2). Also revised text to state that ovarian cancer incidence rates have been declining since at least the 1970s and have decreased by 1.6% per year from 2012 to 2021.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about ovarian, fallopian tube, and primary peritoneal cancers screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/ovarian/hp/ovarian-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389336]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).